# Cervical Cancer Screening

Patient Version

This PDQ cancer information summary has current information about cervical cancer screening. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## Cervical Cancer Screening

Screening means checking for a disease before there are symptoms. Cervical cancer screening is an important part of routine health care for people who have a cervix.

### What is cervical cancer screening?

The goal of screening for cervical cancer is to find precancerous cervical cell changes, when treatment can prevent cervical cancer from developing. Sometimes, cancer is found during cervical screening. Cervical cancer found at an early stage is usually easier to treat. By the time symptoms (https://www.cancer.gov/types/cervical/symptoms) appear, cervical cancer may have begun to spread, making treatment more difficult.

There are three main ways to screen for cervical cancer:

- The human papillomavirus (HPV) test checks cells for infection with high-risk HPV types that can cause cervical cancer.
- The Pap test (also called a Pap smear or cervical cytology) collects cervical cells so they can be checked for changes caused by HPV that may—if left untreated—turn into cervical cancer. It can find precancerous cells and cervical cancer cells. A Pap test also sometimes finds conditions that are not cancer, such as infection or inflammation.
- The HPV/Pap cotest uses an HPV test and Pap test together to check for both high-risk HPV and cervical cell changes.

### When to get screened for cervical cancer

Cervical screening recommendations are developed by several organizations, including the United States Preventive Services Task Force (https://www.uspreventiveservicestaskforce.org/uspstf/recommendation/cervical-cancer-screening) (USPSTF) and the American Cancer Society (https://www.cancer.org/cancer/cervical-cancer/detection-diagnosis-staging/cervical-cancer-screening-guidelines.html) (ACS). How often you should be screened for cervical cancer and which tests you should get will depend on your age and health history. Because HPV vaccination does not prevent infection with all high-risk HPV types, vaccinated people who have a cervix should follow cervical cancer screening recommendations.

#### Age 21-29 years

If you are in this age group, USPSTF recommends getting your first Pap test at age 21, followed by Pap testing every 3 years. Even if you are sexually active, you do not need a Pap test before age 21.

#### Age 30-65 years

If you are in this age group, USPSTF recommends getting screened for cervical cancer using one of the following methods:

- HPV test every 5 years
- HPV/Pap cotest every 5 years
- Pap test every 3 years

Updated cervical cancer screening guidelines from ACS recommend starting screening at age 25 with an HPV test and having HPV testing every 5 years through age 65. However, testing with an HPV/Pap cotest every 5 years or with a Pap test every 3 years is still acceptable. To read about the reasons for updates to the guidelines, visit ACS's Updated Cervical Cancer Screening Guidelines Explained (https://www.cancer.gov/news-events/cancer-currents-blog/2020/cervical-cancer-screening-hpv-test-guideline).

#### Older than 65 years

If you are in this age group, talk with your health care provider to learn if screening is still needed. If you have been screened regularly and had normal test results, your health care provider will probably advise you that you no longer need screening. However, if your recent test results were abnormal or you have not been screened regularly, you may need to continue screening beyond age 65.

#### Exceptions to the cervical cancer screening guidelines

Your health care provider may recommend more frequent screening if:

- you are HIV positive
- you have a weakened immune system
- you were exposed before birth to a medicine called diethylstilbestrol (DES), which was prescribed to some pregnant women through the mid 1970s
- you had a recent abnormal cervical screening test or biopsy result
- you have had cervical cancer

If you've had an operation to remove both the uterus and cervix (called a total hysterectomy) for reasons not related to cancer or abnormal cervical cells you do not need to be screened for cervical cancer. However, if your hysterectomy was related to cervical cancer or precancer, talk with your health care provider to learn what follow-up care you need. If you've had an operation to remove the uterus but not the cervix (sometimes called a partial or supracervical hysterectomy) you should continue routine cervical cancer screening.

### Where to get screened for cervical cancer

Doctors' offices, clinics, and community health centers offer HPV and Pap tests. Many people receive these tests from their ob/gyn (obstetrics/gynecology) or primary care provider.

If you don't have a primary care provider or doctor you see regularly, you can find a clinic near you that offers cervical cancer screening by contacting:

- your state or local health department
- the National Breast and Cervical Cancer Early Detection Program (https://www.cdc.gov/breast-cervical-cancer-screening/) (NBCCEDP) or call 1-800-232-4636; NBCCEDP provides low-income, uninsured, and underserved people access to timely cervical cancer screening and diagnostic services
- a Planned Parenthood (https://www.plannedparenthood.org/health-center) clinic, or call 1-800-230-7526
- NCI's Cancer Information Service (https://www.cancer.gov/contact), or call 1-800-422-6237

Cervical screening test results usually come back from the lab in about 1–3 weeks. If you don't hear from your health care provider, call and ask for your test results. Make sure you understand any follow-up visits or tests you may need.

### What to expect during a cervical cancer screening test

Cervical cancer screening tests are usually done during a pelvic exam, which takes only a few minutes. During the exam, you lie on your back on an exam table, bend your knees, and put your feet into supports at the end of the table. The health care provider uses a speculum to gently open your vagina to see the cervix. A soft, narrow brush or tiny spatula is used to collect a small sample of cells from your cervix. You may have the option to self-collect the cervical sample during your appointment. If you're interested in this option, talk with your health care provider to learn more.

Cervical sampling. A speculum is inserted into the vagina to widen it. Then, a brush is inserted into the vagina to collect cells from the cervix.

Cervical sampling; drawing shows a side view of the female reproductive anatomy. A speculum is shown widening the opening of the vagina. Also shown is a provider's gloved hand inserting a brush into the open vagina to collect cells from the cervix. The brush is touching the cervix at the base of the uterus. The rectum is also shown. One inset shows the brush touching the center of the cervix. A second inset shows a woman covered by a drape on an exam table with her legs apart and her feet in stirrups.

The sample is then sent to a lab, where the cells can be checked to see if they are infected with the types of HPV that cause cancer (an HPV test). The same sample can be checked for abnormal cells (a Pap test). When both an HPV test and a Pap test are done on the same sample, this is called an HPV/Pap cotest.

A pelvic exam may include more than taking samples for an HPV and/or Pap test. Your health care provider may also check the size, shape, and position of the uterus and ovaries and feel for any lumps or cysts. The rectum may also be checked for lumps or abnormal areas. You may talk with your health care provider about being tested for sexually transmitted infections.

Most health care providers will tell you what to expect at each step of the exam, so you will be at ease.

Researchers have found that cervical cancer screening may be less effective for people with obesity, possibly because of challenges in visualizing the cervix and obtaining a cell sample. Approaches to improve cervical visualization, including the use of larger speculum, may be helpful.

### Does cervical cancer screening have any risks?

Cervical cancer screening saves lives. Very few people screened for cervical cancer at routine intervals develop cervical cancer. Screening can detect cervical changes early, lowering a person's chance of dying from cervical cancer. Despite these benefits, cervical screening is not perfect, and there are several possible harms to be aware of. Before having any screening test, you may want to discuss the test with your doctor.

Potential risks of harm from cervical cancer screening include:

- Unnecessary follow-up tests and treatment: Finding a condition through screening that would not have caused problems may lead to unnecessary follow-up tests and possibly treatment. The current recommended screening intervals and tests reduce the chance of finding and treating cervical cell abnormalities that would have gone away on their own.
- False-positive test results: Screening test results may sometimes appear abnormal even though no precancer or cancer is present. When a Pap test shows a false-positive result (one that shows there is precancer or cancer when there isn't), it can cause anxiety and is usually followed by more tests and procedures (such as colposcopy, cryotherapy, or loop electrosurgical excision procedure), which also have harms.
- False-negative test results: Screening test results may appear normal even though cervical precancer or cancer is present. A person who receives a false-negative test result (one that shows there is no cancer when there is) may delay seeking medical care even if there are symptoms.

For a downloadable booklet about cervical cancer screening, visit Understanding Cervical Changes: A Health Guide (https://www.cancer.gov/publications/patient-education/understanding-cervical-changes).

## HPV and Pap Test Results: Next Steps after an Abnormal Cervical Cancer Screening Test

People who have cervical cancer screening at regular intervals are rarely found to have cancer. Most people who receive abnormal cervical cancer screening results either have human papillomavirus (HPV) infections or have early cell changes that can be monitored (since they often go away on their own) or treated early (to prevent the development of cervical cancer).

See Cervical Cancer Screening (https://www.cancer.gov/types/cervical/screening) for information about when to get screened and what to expect during the tests.

### HPV test results: What positive and negative results on a screening test mean

HPV test results show whether high-risk HPV types were found in cervical cells. An HPV test will come back as a negative test result or a positive test result.

- Negative HPV test result: High-risk HPV was not found. You should have the next test in 5 years. You may need to come back sooner if you had abnormal results in the past.
- Positive HPV test result: High-risk HPV was found. Your health care provider will recommend follow-up steps you need to take (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_17), based on your specific test result.

What does it mean if you have a positive HPV test after years of negative tests?

Sometimes, after several negative HPV tests, a woman may have a positive HPV test result. This is not necessarily a sign of a new HPV infection. Sometimes an HPV infection can become active again after many years. Some other viruses behave this way. For example, the virus that causes chickenpox can reactivate later in life to cause shingles.

Researchers don’t know whether a reactivated HPV infection has the same risk of causing cervical cell changes or cervical cancer as a new HPV infection.

### Pap test results: What normal, abnormal, and unsatisfactory screening test results mean

Pap test results show whether cervical cells are normal or abnormal. A Pap test may also come back as unsatisfactory.

Normal Pap test results: No abnormal cervical cells were found. A normal test result may also be called a negative test result or negative for intraepithelial lesion (area of abnormal growth) or malignancy.

Unsatisfactory Pap test results: The lab sample may not have had enough cells, or the cells may have been clumped together or hidden by blood or mucus. Your health care provider will ask you to come in for another Pap test in 2 to 4 months.

Abnormal Pap test results: An abnormal test result may also be called a positive test result. Some of the cells of the cervix look different from the normal cells. An abnormal test result does not mean you have cancer. Your health care provider will recommend monitoring, more testing, or treatment.

Abnormal Pap test results include

- Atypical squamous cells of undetermined significance (ASC-US): This is the most common abnormal Pap test finding. It means that some cells don't look completely normal, but it's not clear if the changes are caused by HPV infection. Other things can cause cells to look abnormal, including irritation, some infections (such as a yeast infection), growths (such as polyps in the uterus), and changes in hormones that occur during pregnancy or menopause. Although these things may make cervical cells look abnormal, they are not related to cancer. Your health care provider will usually do an HPV test to see if the changes may be caused by an HPV infection. If the HPV test is negative, estrogen cream may be prescribed to see if the cell changes are caused by low hormone levels. If the HPV test is positive, you may need additional follow-up tests (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_17).
- Atypical glandular cells (AGC): Some glandular cells were found that do not look normal. This can be a sign of a more serious problem up inside the uterus, so your health care provider will likely ask you to come back for a colposcopy (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_17).
- Low-grade squamous intraepithelial lesions (LSIL): There are low-grade changes that are usually caused by an HPV infection. Your health care provider will likely ask you to come back for additional testing (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_17) to make sure that there are not more serious (high-grade) changes.
- Atypical squamous cells, cannot exclude high-grade squamous intraepithelial lesion (ASC-H): Some abnormal squamous cells were found that may be a high-grade squamous intraepithelial lesion (HSIL), although it's not certain. Your health care provider will likely ask you to come back for a colposcopy (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_17).
- High-grade squamous intraepithelial lesions (HSIL): There are moderately or severely abnormal cervical cells that could become cancer in the future if not treated. Your health care provider will likely ask you to come back for a colposcopy (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_17).
- Adenocarcinoma in situ (AIS): An advanced lesion (area of abnormal growth) was found in the glandular tissue of the cervix. AIS lesions may be referred to as precancer and may become cancer (cervical adenocarcinoma) if not treated. Your health care provider will likely ask you to come back for a colposcopy (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_17).
- Cervical cancer cells (squamous cell carcinoma or adenocarcinoma): Cancer cells were found; this finding is very rare for people who have been screened at regular intervals. If a biopsy shows that cervical cancer is present, your doctor will order certain tests to find out if cancer cells have spread within the cervix or to other parts of the body. See the Cervical Cancer Diagnosis (https://www.cancer.gov/types/cervical/diagnosis) page for information about tests that may be used to diagnose and stage cervical cancer.
  Cervical changes. The cervix is the lower, narrow end of the uterus that forms a canal between the uterus and vagina. Before cancer cells form in tissues of the cervix, the cells of the cervix go through abnormal changes called dysplasia. There are different types of dysplasia. Mild dysplasia, called low-grade intraepithelial lesion (LSIL) is one type. Moderate or severe dysplasia, called high-grade intraepithelial lesion (HSIL) is another type of dysplasia. LSIL and HSIL may or may not become cancer.
  Cervical changes; drawing shows a cross-section of the uterus, cervix, and vagina. Also shown are four panels showing cell changes inside the cervix. The first panel shows normal cells. The second and third panels show abnormal cells called LSIL and HSIL. The fourth panel shows cervical cancer cells. Arrows are used between the panels to show that normal cells may become LSIL or HSIL, which may or may not become cancer.

### Follow-up tests and procedures after an abnormal Pap test (Pap smear) or HPV test

Keep in mind that most people with abnormal cervical screening test results do not have cancer. However, if you have an abnormal test result, it’s important to get the follow-up care that your health care provider recommends.

Until recently, follow-up recommendations were based on the results of a person's most recent cervical screening test. However, updated ASCCP risk-based management consensus guidelines (https://www.asccp.org/guidelines) advise a more tailored approach to follow-up care.

What these updated guidelines mean is that, in addition to your current Pap, HPV, or cotest screening result, your health care provider will consider additional factors when recommending follow-up care, including

- previous screening test results
- previous treatments for precancerous cervical cell changes
- personal health factors, such as your age

Based on your individual risk of developing severe cervical cell changes that could become cervical cancer, you may be advised to

- return for a repeat HPV test or HPV/Pap cotest in 1 or 3 years
- have a colposcopy and biopsy
- receive treatment; see Treatment for high-grade cervical cell changes (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_35)

These updated guidelines focus on detecting and treating severe cervical cell changes that could develop into cervical cancer while also decreasing testing and treatment for less severe conditions (low-grade cervical cell changes).

#### Colposcopy

During a colposcopy, your doctor inserts a speculum to gently open the vagina and see the cervix. A vinegar solution is applied to the cervix to help show abnormal areas. Your doctor then places an instrument called a colposcope close to the vagina. It has a bright light and a magnifying lens and allows your doctor to look closely at your vagina and cervix for abnormal areas.

A colposcopy usually includes a biopsy, so that the cells or tissues can be checked under a microscope for signs of disease, including cervical cancer.

#### Cervical biopsy

A biopsy is a procedure used to remove cervical cells or tissue to be checked under a microscope for abnormal cervical cells, including cancer. In addition to removing a sample for further testing, some types of biopsies may be used as treatment, to remove abnormal cervical tissue or lesions.

Talk with your doctor to learn what to expect during and after your biopsy procedure. Bleeding and/or discharge after a biopsy may occur. Some people have pain that feels like cramps during menstruation.

#### Biopsy findings: cervical intraepithelial neoplasia (CIN)

Biopsy samples are checked by a pathologist for CIN. CIN is the term used to describe abnormal cervical cells that were found on the surface of the cervix after a biopsy.

CIN is graded on a scale of 1 to 3, based on how abnormal the cells look under a microscope and how much of the cervical tissue is affected. LSIL changes seen on a Pap test are generally CIN 1. HSIL changes seen on a Pap test can be CIN 2, CIN2/3, or CIN 3.

- CIN 1 changes are mild, or low grade. They usually go away on their own and do not require treatment.
- CIN 2 changes are moderate and are typically treated by removing the abnormal cells. However, CIN 2 can sometimes go away on its own. Some people, after consulting with their health care provider, may decide to have a colposcopy with biopsy every 6 months. CIN 2 must be treated if it progresses to CIN 3 or does not go away in 1 to 2 years.
- CIN 3 changes are severely abnormal. Although CIN 3 is not cancer, it may become cancer and spread to nearby normal tissue if not treated. Doctors do not yet have a way to tell which cases of CIN 3 will become cancer and which will not. CIN 3 should be treated right away, unless you are pregnant. See Pregnancy and Treatment for High-Grade Cervical Cell Changes (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results#_41) for more information.

### Treatment for high-grade cervical cell changes

The goal of treating high-grade cervical cell changes is to remove or destroy abnormal cervical cells that have a high chance of becoming cancer. Some of these treatments are also used for early-stage cervical cancer.

The most common treatment for high-grade cervical cell changes is conization, the removal of a cone-shaped piece of tissue from the cervix and cervical canal. There are two types of conization.

- Loop electrosurgical excision procedure (LEEP) uses a thin wire loop, through which an electrical current is passed, to remove abnormal tissue. This procedure is typically done in a doctor’s office. It usually takes only a few minutes, and local anesthesia is used to numb the area.
- Cold knife conization uses a scalpel to remove the abnormal tissue. This procedure is done at the hospital under general anesthesia.

Several other treatments may also be used.

- Laser therapy uses a laser (narrow beam of intense light) to remove or destroy abnormal tissue. This is an outpatient procedure that may be done under local or general anesthesia.
- Cryotherapy uses a special cold probe to destroy abnormal tissue by freezing it. This procedure is done at a doctor’s office. It takes only a few minutes and usually does not require anesthesia.
- Total hysterectomy is the surgical removal of the uterus and cervix. It is often used to treat AIS. It is used to treat CIN3 only if the abnormal cells were not completely removed by other treatments.

#### Pregnancy and treatment for high-grade cervical cell changes

Rarely, procedures to treat cervical cell abnormalities can weaken the cervix, increasing the risk of premature birth or miscarriage.

If you are pregnant or plan to become pregnant, your health care provider will talk with you about procedures that are recommended for you and the timing of these procedures. Depending on your specific diagnosis, you may be treated postpartum, or after delivery.

For a downloadable booklet about cervical cancer screening, see Understanding Cervical Changes: A Health Guide (https://www.cancer.gov/types/cervical/screening/abnormal-hpv-pap-test-results/understanding-cervical-changes.pdf).